# Cigarette Smoking: Health Risks and How to Quit (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the prevention and cessation of cigarette smoking and the control of tobacco use. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Screening and Prevention Editorial Board.

## What is prevention?

Cancer prevention is action taken to lower the chance of getting cancer. By preventing cancer, the number of new cases of cancer in a group or population is lowered. Hopefully, this will lower the number of deaths caused by cancer.

To prevent new cancers from starting, scientists look at risk factors and protective factors. Anything that increases your chance of developing cancer is called a cancer risk factor; anything that decreases your chance of developing cancer is called a cancer protective factor.

Some risk factors for cancer can be avoided, but many cannot. For example, both smoking and inheriting certain genes are risk factors for some types of cancer, but only smoking can be avoided. Regular exercise and a healthy diet may be protective factors for some types of cancer. Avoiding risk factors and increasing protective factors may lower your risk but it does not mean that you will not get cancer.

## General Information About Tobacco Use

Key Points for This Section
- Smoking is the leading cause of cancer in the United States.
- Smoking causes many other health problems.
- Being exposed to secondhand smoke increases the risk of cancer and other diseases.

### Smoking is the leading cause of cancer in the United States.

Smoking increases the risk of many types of cancer. These include:

- Lung cancer.
- Throat cancer.
- Mouth cancer.
- Nasal cavity cancer.
- Esophageal cancer.
- Stomach cancer.
- Pancreatic cancer.
- Kidney cancer.
- Bladder cancer.
- Cervical cancer.
- Acute myeloid leukemia.

A smoker’s risk of cancer can be 2 to 10 times higher than it is for a person who never smoked. This depends on how much and how long the person smoked.

Lung cancer is the leading cause of cancer death in both men and women. In 2014, about 19% of adult men and about 15% of adult women were smokers. In the last 30 years, the total number of smokers has decreased, especially among men. Since the 1980s, deaths caused by lung cancer in men have been decreasing.

From 2011 to 2014, smoking decreased among middle school and high school students. Cigarette smoking among male and female high school students of all ethnic groups increased markedly during the early 1990s, with rates between 20% and 30%. By 2021, smoking in this population had declined to 2%. Raising the legal age to buy and use tobacco products is being studied as a way to prevent or decrease smoking and other tobacco use among young people.

### Smoking causes many other health problems.

Smoking is linked with many diseases besides cancer. These include:

- Heart disease.
- Stroke.
- Emphysema.
- Bronchitis.

Other health problems that may be linked to smoking are:

- Cataracts.
- Bone disease.
- Trouble becoming pregnant.

Smoking during pregnancy may cause problems such as slow growth of the fetus and low birth weight.

### Being exposed to secondhand smoke increases the risk of cancer and other diseases.

Smoking can also affect the health of nonsmokers. Smoke that comes from the burning of a tobacco product or smoke that is exhaled by smokers is called secondhand smoke. Inhaling secondhand smoke is called involuntary or passive smoking.

The same cancer-causing chemicals inhaled by tobacco smokers are inhaled in lower amounts by people exposed to secondhand tobacco smoke. Nonsmokers who are exposed to secondhand smoke have a higher risk of lung cancer and coronary heart disease. Children exposed to tobacco smoke have higher risks of the following:

- Sudden infant death syndrome (SIDS).
- Worsened asthma.
- Ear infections.
- Respiratory problems such as lung infections, coughing, wheezing, or trouble breathing.

## Health Risks of Smoking and Ways to Quit

Key Points for This Section
- Quitting smoking improves health in smokers of all ages.
- Different ways to quit smoking have been studied. The following are the most common methods used to help smokers quit:
  - Counseling
  - Drug treatment
  - Smoking reduction
- There are new and different types of tobacco and nicotine products.
- Cancer prevention clinical trials are used to study ways to prevent cancer.
- New ways to help smokers quit are being studied in clinical trials.

### Quitting smoking improves health in smokers of all ages.

The risk of most health problems from smoking, including cancer and heart and lung disease, can be lowered by stopping smoking. People of all ages can improve their health if they quit smoking. Quitting at a younger age will improve a person's health even more. People who quit smoking cut their risk of lung cancer by 30% to 50% after 10 years compared to people who keep smoking, and they cut their risk of cancer of the mouth or esophagus in half within 5 years after quitting.

The damage caused by smoking is even worse for people who have had cancer. They have an increased risk of cancer recurrence, new cancers, and long-term side effects from cancer treatment. Quitting smoking and stopping other unhealthy behaviors can improve long-term health and quality of life.

The Public Health Service has a set of guidelines called Treating Tobacco Use and Dependence (https://www.ahrq.gov/professionals/clinicians-providers/guidelines-recommendations/tobacco/index.html). It asks health care professionals to talk to their patients about the health problems caused by smoking and the importance of quitting smoking.

### Different ways to quit smoking have been studied. The following are the most common methods used to help smokers quit:

#### Counseling

People who have even a short counseling session with a health care professional are more likely to quit smoking. Your doctor or other health care professional may take the following steps to help you quit:

- Ask about your smoking habits at every visit.
- Advise you to stop smoking.
- Ask you how willing you are to quit.
- Help you plan to quit smoking by:
  - setting a date to quit smoking;
  - giving you self-help materials;
  - recommending drug treatment.
- Plan follow-up visits with you.

The Lung Health Study found that heavy smokers who received counseling from a doctor, took part in group sessions with other smokers to change their behavior, and used nicotine gum were more likely to quit smoking compared with smokers who did not receive counseling from a doctor, take part in group sessions, and use nicotine gum. They also had a lower risk of lung cancer, other cancers, heart disease, and respiratory disease.

Childhood cancer survivors who smoke may be more likely to quit when they take part in programs that use peer-counseling. In these programs, childhood cancer survivors are trained in ways to give support to other childhood cancer survivors who smoke and want to quit. More people quit smoking with peer-counseling than with self-help programs. If you are a childhood cancer survivor and you smoke, talk to your doctor about peer-counseling programs.

#### Drug treatment

Treatment with drugs is also used to help people quit smoking. These include nicotine replacement products and non-nicotine medicines. People who use any type of drug treatment are more likely to quit smoking after 6 months than those who use a placebo or no drug treatment at all.

Nicotine replacement products have nicotine in them. You slowly reduce the use of the nicotine product in order to reduce the amount of nicotine you take in. Using a nicotine replacement product can help break the addiction to nicotine. It lessens the side effects of nicotine withdrawal, such as feeling depressed or nervous, having trouble thinking clearly, or having trouble sleeping. Nicotine replacement products, used alone or in combination, have been shown to help people quit smoking. These include:

- Nicotine gum.
- Nicotine patches.
- Nicotine nasal spray.
- Nicotine inhalers.
- Nicotine lozenges.

Nicotine replacement products can cause problems in some people, especially:

- Women who are pregnant or breast-feeding.
- Teenagers.
- People with any of the following medical problems:
  - Heart rhythm problems.
  - High blood pressure that is not controlled.
  - Esophagitis.
  - Ulcers.
  - Insulin-dependent diabetes.
  - Asthma.

Other medicines that do not have nicotine in them are used to help people quit smoking. These include:

- Bupropion (also called Zyban).
- Varenicline (also called Chantix).

These medicines lessen nicotine craving and nicotine withdrawal symptoms.

It is important to know that bupropion and varenicline may cause serious psychiatric problems. Symptoms include:

- Changes in behavior.
- Aggressive behavior.
- Anxiety.
- Nervousness.
- Depression.
- Suicidal thoughts and attempted suicide.

Varenicline may also cause serious heart problems.

Before starting to take bupropion or varenicline, talk to your doctor about the important health benefits of quitting smoking and the small but serious risk of problems with the use of these drugs.

#### Smoking reduction

When smokers do not quit smoking completely but smoke fewer cigarettes (smoking reduction) they may still benefit. The more you smoke, the higher your risk of lung cancer and other cancers related to smoking. Studies show that smokers who cut back are more likely to stop smoking in the future.

Smoking less is not as helpful as quitting smoking altogether, and is harmful if you inhale more deeply or smoke more of each cigarette to try to control nicotine cravings. In smokers who do not plan to quit smoking completely, nicotine replacement products have been shown to help them cut down the number of cigarettes they smoke, but this effect does not appear to last over time.

The following resources can help you quit smoking:

- Consumer information about quitting smoking is available at the www.smokefree.gov website.
- The online QuitGuide (https://smokefree.gov/apps-quitguide) may help you understand reasons for smoking and the best ways to quit.
- The booklet Clearing the Air: Quit Smoking Today can be ordered at 1-800-4-CANCER (1-800-422-6237) or printed here (https://smokefree.gov/sites/default/files/pdf/clearing-the-air-accessible.pdf).

### There are new and different types of tobacco and nicotine products.

The use of new or different types of tobacco products and devices that deliver nicotine is increasing rapidly in the United States, especially the use of electronic-cigarettes (e-cigarettes) by adults and adolescents.

Examples of new and different tobacco and nicotine products and devices include the following:

- E-cigarettes.
- Small cigars.
- Water pipes (hookahs) for smoking tobacco.
- Flavored smokeless tobacco products.

More studies are needed to understand the risks and benefits of using these products.

### Cancer prevention clinical trials are used to study ways to prevent cancer.

Cancer prevention clinical trials are used to study ways to lower the risk of developing certain types of cancer. Some cancer prevention trials are conducted with healthy people who have not had cancer but who have an increased risk for cancer. Other prevention trials are conducted with people who have had cancer and are trying to prevent another cancer of the same type or to lower their chance of developing a new type of cancer. Other trials are done with healthy volunteers who are not known to have any risk factors for cancer.

The purpose of some cancer prevention clinical trials is to find out whether actions people take can prevent cancer. These may include eating fruits and vegetables, exercising, quitting smoking, or taking certain medicines, vitamins, minerals, or food supplements.

### New ways to help smokers quit are being studied in clinical trials.

Information about clinical trials supported by NCI can be found on NCI’s clinical trials search (https://www.cancer.gov/research/participate/clinical-trials-search) webpage. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the prevention and cessation of cigarette smoking and the control of tobacco use. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Screening and Prevention Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/screening-prevention).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Screening and Prevention Editorial Board. PDQ Cigarette Smoking. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/causes-prevention/risk/tobacco/quit-smoking-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389305]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).